# Lip and Oral Cavity Cancer Treatment (PDQ®)

Patient Version

This PDQ cancer information summary has current information about the treatment of adult lip and oral cavity cancer. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Adult Treatment Editorial Board.

## General Information About Lip and Oral Cavity Cancer

Key Points for This Section
- Lip and oral cavity cancer is a disease that starts in lips or mouth.
- Tobacco and alcohol use can affect the risk of lip and oral cavity cancer.
- Signs of lip and oral cavity cancer include a sore or lump on the lips or in the mouth.
- Tests that examine the mouth and throat are used to diagnose and stage lip and oral cavity cancer.
- Some people decide to get a second opinion.
- Certain factors affect prognosis (chance of recovery) and treatment options.

### Lip and oral cavity cancer is a disease that starts in lips or mouth.

The oral cavity refers to the mouth. It includes:

- the front two thirds of the tongue
- the gingiva (gums)
- the buccal mucosa (the lining of the inside of the cheeks)
- the floor (bottom) of the mouth under the tongue
- the hard palate (the roof of the mouth)
- the retromolar trigone (the small area behind the wisdom teeth)

Anatomy of the oral cavity. The oral cavity includes the lips, hard palate (the bony front portion of the roof of the mouth), soft palate (the muscular back portion of the roof of the mouth), retromolar trigone (the area behind the wisdom teeth), front two-thirds of the tongue, gingiva (gums), buccal mucosa (the inner lining of the lips and cheeks), and floor of the mouth under the tongue.

Anatomy of the oral cavity; drawing shows the lip, hard palate, soft palate, retromolar trigone, front two-thirds of the tongue, gingiva, buccal mucosa, and floor of mouth. Also shown are the teeth, uvula, and tonsil.

Most lip and oral cavity cancers start in squamous cells, the thin, flat cells lining the inside of the lips and oral cavity. Cancers that start in squamous cells are called squamous cell carcinomas. Cancer cells may spread into deeper tissue as the cancer grows. Squamous cell carcinoma usually develops in areas of leukoplakia (white patches of cells that do not rub off).

Lip and oral cavity cancer is a type of head and neck cancer.

### Tobacco and alcohol use can affect the risk of lip and oral cavity cancer.

Lip and oral cavity cancer is caused by certain changes to the way lip and oral cavity cells function, especially how they grow and divide into new cells. There are many risk factors for lip and oral cavity cancer, but many do not directly cause cancer. Instead, they increase the chance of DNA damage in cells that may lead to lip and oral cavity cancer. Learn more about how cancer develops at What Is Cancer? (https://www.cancer.gov/about-cancer/understanding/what-is-cancer)

A risk factor is anything that increases the chance of getting a disease. Some risk factors for lip and oral cavity cancer, such as tobacco and alcohol use, can be changed. However, risk factors also include things people cannot change, like their genetics. Learning about risk factors for lip and oral cavity cancer can help you make changes that might lower your risk of getting it.

Risk factors for lip and oral cavity cancer include:

- using tobacco products
- heavy alcohol use
- being exposed to natural sunlight or artificial sunlight (such as from tanning beds) over long periods of time
- being male

Learn more about Tobacco (https://www.cancer.gov/about-cancer/causes-prevention/risk/tobacco), including help with quitting.

Having one or more of these risk factors does not mean that you will get lip and oral cavity cancer. Many people with risk factors never develop lip and oral cavity cancer, while others with no known risk factors do. Talk with your doctor if you think you may be at risk.

### Signs of lip and oral cavity cancer include a sore or lump on the lips or in the mouth.

These and other signs and symptoms may be caused by lip and oral cavity cancer or by other conditions. Check with your doctor if you have any of the following:

- a sore on the lip or in the mouth that does not heal
- a lump or thickening on the lips or gums or in the mouth
- a white or red patch on the gums, tongue, or lining of the mouth
- bleeding, pain, or numbness in the lip or mouth
- change in voice
- loose teeth or dentures that no longer fit well
- trouble chewing or swallowing or moving the tongue or jaw
- swelling of jaw
- sore throat or feeling that something is caught in the throat

Lip and oral cavity cancer may not have any symptoms and is sometimes found during a regular dental exam.

### Tests that examine the mouth and throat are used to diagnose and stage lip and oral cavity cancer.

If you have symptoms that suggest lip and oral cavity cancer, your doctor will need to find out if these are due to cancer or another problem. They will ask when the symptoms started and how often you have been having them. They will also ask about your personal and family health history and do a physical exam. Based on these results, the doctor may recommend other tests. If you are diagnosed with lip and oral cavity cancer, the results of these tests will help you and your doctor plan treatment.

The following tests and procedures are used to diagnose and stage lip and oral cavity cancer:

- Physical exam of the lips and oral cavity is an exam to check the lips and oral cavity for abnormal areas. The medical doctor or dentist will feel the entire inside of the mouth with a gloved finger and examine the oral cavity with a small long-handled mirror and lights. This will include checking the insides of the cheeks and lips; the gums; the roof and floor of the mouth; and the top, bottom, and sides of the tongue. The neck will be felt for swollen lymph nodes. A history of the patient’s health habits and past illnesses and medical and dental treatments will also be taken.
- Endoscopy is a procedure to look at organs and tissues inside the body to check for abnormal areas. An endoscope is inserted through an incision (cut) in the skin or opening in the body, such as the mouth. An endoscope is a thin, tube-like instrument with a light and a lens for viewing. It may also have a tool to remove tissue or lymph node samples, which are checked under a microscope for signs of disease.
- Biopsy is the removal of cells or tissues so they can be viewed under a microscope by a pathologist. If leukoplakia is found, cells taken from the patches are also checked under the microscope for signs of cancer.
- Exfoliative cytology is a procedure to collect cells from the lip or oral cavity. A piece of cotton, a brush, or a small wooden stick is used to gently scrape cells from the lips, tongue, mouth, or throat. The cells are viewed under a microscope to find out if they are abnormal.
- MRI (magnetic resonance imaging) uses a magnet, radio waves, and a computer to make a series of detailed pictures of areas inside the body. This procedure is also called nuclear magnetic resonance imaging (NMRI).
- CT scan (CAT scan) uses a computer linked to an x-ray machine to make a series of detailed pictures of areas inside the body. The pictures are taken from different angles and are used to create 3-D views of tissues and organs. A dye may be injected into a vein or swallowed to help the organs or tissues show up more clearly. This procedure is also called computed tomography, computerized tomography, or computerized axial tomography.
  Computed tomography (CT) scan of the head and neck. The patient lies on a table that slides through the CT scanner, which takes x-ray pictures of the inside of the head and neck.
  Computed tomography (CT) scan of the head and neck; drawing shows a patient lying on a table that slides through the CT scanner, which takes x-ray pictures of the inside of the head and neck.
- Barium swallow is a series of x-rays of the esophagus and stomach. The patient drinks a liquid that contains barium (a silver-white metallic compound). The liquid coats the esophagus and x-rays are taken. This procedure is also called an upper GI series.
- PET scan (positron emission tomography scan) uses a small amount of radioactive sugar (also called glucose) that is injected into a vein. Then a scanner rotates around the body to make detailed, computerized pictures of areas inside the body where the glucose is taken up. Because cancer cells often take up more glucose than normal cells, the pictures can be used to find cancer cells in the body.
- Bone scan is a procedure to check if there are rapidly dividing cells, such as cancer cells, in the bone. A very small amount of radioactive material is injected into a vein and travels through the bloodstream. The radioactive material collects in the bones with cancer and is detected by a scanner.

### Some people decide to get a second opinion.

You may want to get a second opinion to confirm your cancer diagnosis and treatment plan. If you seek a second opinion, you will need to get medical test results and reports from the first doctor to share with the second doctor. The second doctor will review the pathology report, slides, and scans. They may agree with the first doctor, suggest changes or another treatment approach, or provide more information about your cancer.

To learn more about choosing a doctor and getting a second opinion, see Finding Cancer Care (https://www.cancer.gov/about-cancer/managing-care/finding-cancer-care). You can contact NCI’s Cancer Information Service (https://www.cancer.gov/contact) via chat, email, or phone (both in English and Spanish) for help finding a doctor, hospital, or getting a second opinion. For questions you might want to ask at your appointments, see Questions to Ask Your Doctor About Cancer (https://www.cancer.gov/about-cancer/coping/questions).

### Certain factors affect prognosis (chance of recovery) and treatment options.

The prognosis depends on:

- the cancer stage
- where the tumor is in the lip or oral cavity
- whether the cancer has spread to blood vessels

For patients who smoke, the chance of recovery is better if they stop smoking before beginning radiation therapy.

Treatment options depend on:

- the stage of the cancer
- the size of the tumor and where it is in the lip or oral cavity
- whether the patient's appearance and ability to talk and eat can stay the same
- the patient's age and general health

Patients who have had lip and oral cavity cancer have an increased risk of developing a second cancer in the head or neck. Frequent and careful follow-up is important. Clinical trials are studying the use of retinoid drugs to reduce the risk of a second head and neck cancer. Information about ongoing clinical trials is available from the NCI website (https://www.cancer.gov/research/participate/clinical-trials).

## Stages of Lip and Oral Cavity Cancer

Key Points for This Section
- Cancer stage describes the extent of cancer in the body.
- The following stages are used for lip and oral cavity cancer:
  - Stage 0 (carcinoma in situ)
  - Stage I (also called stage 1) lip and oral cavity cancer
  - Stage II (also called stage 2) lip and oral cavity cancer
  - Stage III (also called stage 3) lip and oral cavity cancer
  - Stage IV (also called stage 4) lip and oral cavity cancer
- Lip and oral cavity cancer can recur (come back) after it has been treated.

### Cancer stage describes the extent of cancer in the body.

Cancer stage describes the extent of cancer in the body, such as the size of the tumor, whether it has spread, and how far it has spread from where it first formed. Knowing the cancer stage helps plan treatment.

There are several staging systems for cancer that describe the extent of the cancer. Lip and oral cavity cancer staging usually uses the TNM staging system. The cancer may be described by this staging system in your pathology report. Based on the TNM results, a stage (I, II, III, or IV, also written as 1, 2, 3, or 4) is assigned to the cancer. When talking to you about your diagnosis, your doctor may describe the cancer as one of these stages.

Learn more about Cancer Staging (https://www.cancer.gov/about-cancer/diagnosis-staging/staging).

### The following stages are used for lip and oral cavity cancer:

#### Stage 0 (carcinoma in situ)

In stage 0, abnormal cells are found in the lining of the lips and oral cavity. These abnormal cells may become cancer and spread into nearby normal tissue. Stage 0 is also called carcinoma in situ.

Tumor sizes are often measured in centimeters (cm) or inches. Common food items that can be used to show tumor size in cm include: a pea (1 cm), a peanut (2 cm), a grape (3 cm), a walnut (4 cm), a lime (5 cm or 2 inches), an egg (6 cm), a peach (7 cm), and a grapefruit (10 cm or 4 inches).

Drawing shows different sizes of a tumor in centimeters (cm) compared to the size of a pea (1 cm), a peanut (2 cm), a grape (3 cm), a walnut (4 cm), a lime (5 cm), an egg (6 cm), a peach (7 cm), and a grapefruit (10 cm). Also shown is a 10-cm ruler and a 4-inch ruler.

#### Stage I (also called stage 1) lip and oral cavity cancer

In stage I, cancer has formed. The tumor is 2 centimeters or smaller and the deepest point of tumor invasion is 5 millimeters or less.

Tumor sizes are often measured in millimeters (mm) or centimeters. Common items that can be used to show tumor size in mm include: a sharp pencil point (1 mm), a new crayon point (2 mm), a pencil-top eraser (5 mm), a pea (10 mm), a peanut (20 mm), and a lime (50 mm).

Drawing shows different sizes of common items in millimeters (mm): a sharp pencil point (1 mm), a new crayon point (2 mm), a pencil-top eraser (5 mm), a pea (10 mm), a peanut (20 mm), and a lime (50 mm). Also shown is a 2-centimeter (cm) ruler that shows 10 mm is equal to 1 cm.

#### Stage II (also called stage 2) lip and oral cavity cancer

In stage II, the tumor:

- is 2 centimeters or smaller and the deepest point of tumor invasion is greater than 5 millimeters; or
- is larger than 2 centimeters but not larger than 4 centimeters and the deepest point of tumor invasion is 10 millimeters or less.

#### Stage III (also called stage 3) lip and oral cavity cancer

In stage III, the tumor:

- is larger than 2 centimeters but not larger than 4 centimeters and the deepest point of tumor invasion is greater than 10 millimeters; or
- is larger than 4 centimeters and the deepest point of tumor invasion is 10 millimeters or less; or
- has spread to one lymph node that is 3 centimeters or smaller, on the same side of the neck as the primary tumor.

#### Stage IV (also called stage 4) lip and oral cavity cancer

Stage IV is divided into stages IVA, IVB, and IVC.

- In stage IVA, the tumor:
  - is larger than 4 centimeters and the deepest point of tumor invasion is greater than 10 millimeters; or has spread to the outer surface of the upper or lower jawbone, into the maxillary sinus, or to the skin of the face. The cancer may have spread to one lymph node that is 3 centimeters or smaller, on the same side of the neck as the primary tumor; or
  - is any size or cancer has spread to the outer surface of the upper or lower jawbone, into the maxillary sinus, or to the skin of the face. Cancer has spread:
    - to one lymph node that is 3 centimeters or smaller, on the same side of the neck as the primary tumor, and cancer has spread through the outside covering of the lymph node into nearby connective tissue; or
    - to one lymph node that is larger than 3 centimeters but not larger than 6 centimeters, on the same side of the neck as the primary tumor; or
    - to multiple lymph nodes that are not larger than 6 centimeters, on the same side of the neck as the primary tumor; or
    - to multiple lymph nodes that are not larger than 6 centimeters, on the opposite side of the neck as the primary tumor or on both sides of the neck.
- In stage IVB, the tumor:
  - has spread to one lymph node that is larger than 6 centimeters; or
  - has spread to one lymph node that is larger than 3 centimeters, on the same side of the neck as the primary tumor, and cancer has spread through the outside covering of the lymph node into nearby connective tissue; or
  - has spread to one lymph node of any size on the opposite side of the neck as the primary tumor, and cancer has spread through the outside covering of the lymph node into nearby connective tissue; or
  - has spread to multiple lymph nodes anywhere in the neck, and cancer has spread through the outside covering of any lymph node into nearby connective tissue; or
  - has spread further into the muscles or bones needed for chewing, or to the part of the sphenoid bone behind the upper jaw, and/or to the carotid artery near the base of the skull. Cancer may have also spread to one or more lymph nodes of any size, anywhere in the neck.
- In stage IVC, the tumor:
  - has spread beyond the lip or oral cavity to other parts of the body, such as the lung, liver, or bone.
    Stage IVC lip and oral cavity cancer is also called metastatic lip and oral cavity cancer. Metastatic cancer happens when cancer cells travel through the lymphatic system or blood and form tumors in other parts of the body. The metastatic tumor is the same type of cancer as the primary tumor. For example, if lip and oral cavity cancer spreads to the lung, the cancer cells in the lung are actually lip and oral cavity cancer cells. The disease is called metastatic lip and oral cavity cancer, not lung cancer. Learn more in Metastatic Cancer: When Cancer Spreads (https://www.cancer.gov/types/metastatic-cancer).

### Lip and oral cavity cancer can recur (come back) after it has been treated.

Recurrent lip and oral cavity cancer is cancer that has come back after it has been treated. If lip and oral cavity cancer comes back, it may come back in the lip, mouth, or other parts of the body. Tests will help determine where in the body the cancer has returned. The type of treatment that you have for recurrent lip and oral cavity cancer will depend on where it has come back.

Learn more in Recurrent Cancer: When Cancer Comes Back (https://www.cancer.gov/types/recurrent-cancer). Information to help you cope and talk with your health care team can be found in the booklet When Cancer Returns (https://www.cancer.gov/publications/patient-education/when-cancer-returns).

## Treatment Option Overview

Key Points for This Section
- There are different types of treatment for people with lip and oral cavity cancer.
- People with lip and oral cavity cancer should have their treatment planned by a team of doctors who are expert in treating head and neck cancer.
- The following types of treatment are used:
  - Surgery
  - Radiation therapy
  - Immunotherapy
- New types of treatment are being tested in clinical trials.
- Follow-up care may be needed.

### There are different types of treatment for people with lip and oral cavity cancer.

Different types of treatments are available for lip and oral cavity cancer. You and your cancer care team will work together to decide your treatment plan, which may include more than one type of treatment. Many factors will be considered, such as the stage of the cancer, your overall health, and your preferences. Your plan will include information about your cancer, the goals of treatment, your treatment options and the possible side effects, and the expected length of treatment.

Talking with your cancer care team before treatment begins about what to expect will be helpful. You'll want to learn what you need to do before treatment begins, how you'll feel while going through it, and what kind of help you will need. Learn more at Questions to Ask Your Doctor About Treatment (https://www.cancer.gov/about-cancer/treatment/questions).

### People with lip and oral cavity cancer should have their treatment planned by a team of doctors who are expert in treating head and neck cancer.

An oncologist, a doctor who specializes in treating people with cancer, oversees treatment for lip and oral cavity cancer. Because the lips and oral cavity are important for breathing, eating, and talking, you may need special help adjusting to the side effects of the cancer and its treatment. The oncologist may refer you to other health care providers who are experts in treating head and neck cancer and also specialize in other areas of medicine. Other specialists may include:

- head and neck surgeon
- radiation oncologist
- dentist
- speech therapist
- dietitian
- psychologist
- rehabilitation specialist
- plastic surgeon

### The following types of treatment are used:

#### Surgery

Surgery (removing the cancer in an operation) is a common treatment for all stages of lip and oral cavity cancer. Surgery may include:

- Wide local excision is the removal of the cancer and some of the healthy tissue around it. If cancer has spread into bone, surgery may include removal of the involved bone tissue.
- Neck dissection is the removal of lymph nodes and other tissues in the neck. This is done when cancer may have spread from the lip and oral cavity.
- Plastic surgery is an operation that restores or improves the appearance of parts of the body. Dental implants, a skin graft, or other plastic surgery may be needed to repair parts of the mouth, throat, or neck after removal of large tumors.

After the doctor removes all the cancer that can be seen at the time of the surgery, some patients may be given chemotherapy or radiation therapy after surgery to kill any cancer cells that are left. Treatment given after the surgery, to lower the risk that the cancer will come back, is called adjuvant therapy.

Learn more about Surgery to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/surgery).

#### Radiation therapy

Radiation therapy uses high-energy x-rays or other types of radiation to kill cancer cells or keep them from growing by damaging their DNA. External and internal radiation therapy are used to treat lip and oral cavity cancer:

- External radiation therapy uses a machine outside the body to send radiation toward the area of the body with cancer.
  External-beam radiation therapy of the head and neck. A machine is used to aim high-energy radiation at the cancer. The machine can rotate around the patient, delivering radiation from many different angles to provide highly conformal treatment. A mesh mask helps keep the patient’s head and neck from moving during treatment. Small ink marks are put on the mask. The ink marks are used to line up the radiation machine in the same position before each treatment.
  External-beam radiation therapy of the head and neck; drawing shows a patient lying on a table under a machine that is used to aim high-energy radiation at the cancer. An inset shows a mesh mask that helps keep the patient's head and neck from moving during treatment. The mask has pieces of white tape with small ink marks on it. The ink marks are used to line up the radiation machine in the same position before each treatment.
- Internal radiation therapy (also called brachytherapy) uses a radioactive substance sealed in needles, seeds, wires, or catheters that are placed directly into or near the cancer.

Radiation therapy may work better in patients who have stopped smoking before beginning treatment. It is also important for patients to have a dental exam before radiation therapy begins so that existing problems can be treated.

Learn more about Radiation Therapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/radiation-therapy) and Radiation Therapy Side Effects (https://www.cancer.gov/about-cancer/treatment/types/radiation-therapy/side-effects).

#### Immunotherapy

Immunotherapy helps a person’s immune system fight cancer. Your doctor may suggest biomarker tests to help predict your response to certain immunotherapy drugs. Learn more about Biomarker Testing for Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/types/biomarker-testing-cancer-treatment).

Immunotherapy drugs used to treat squamous cell carcinoma of the lip and oral cavity cancer that has come back or spread to other parts of the body include:

- nivolumab (https://www.cancer.gov/about-cancer/treatment/drugs/nivolumab)
- pembrolizumab (https://www.cancer.gov/about-cancer/treatment/drugs/pembrolizumab)

Learn more about Immunotherapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/immunotherapy).

### New types of treatment are being tested in clinical trials.

For some people, joining a clinical trial may be an option. There are different types of clinical trials for people with cancer. For example, a treatment trial tests new treatments or new ways of using existing treatments. Supportive care and palliative care trials look at ways to improve quality of life, especially for those who have side effects from cancer and its treatment.

You can use the clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting participants. This search allows you to filter trials based on the type of cancer, your age, and where the trials are being done. Clinical trials supported by other organizations can be found on the ClinicalTrials.gov website.

Learn the basics about clinical trials at Clinical Trials Information for Patients and Caregivers (https://www.cancer.gov/research/participate/clinical-trials).

### Follow-up care may be needed.

As you go through treatment, you will have follow-up tests or check-ups. Some tests that were done to diagnose or stage the cancer may be repeated to see how well the treatment is working. Decisions about whether to continue, change, or stop treatment may be based on the results of these tests.

Some of the tests will continue to be done from time to time after treatment has ended. The results of these tests can show if your condition has changed or if the cancer has recurred (come back).

## Treatment of Stage I Lip and Oral Cavity Cancer

Learn about the treatments listed below in the Treatment Option Overview.

Treatment of stage I lip and oral cavity cancer depends on where cancer is found in the lip and oral cavity.

Lip

If cancer is in the lip, treatment may include:

- surgery (wide local excision)
- internal radiation therapy with or without external radiation therapy

Front of the tongue

If cancer is in the front of the tongue, treatment may include:

- surgery (wide local excision)
- internal radiation therapy with or without external radiation therapy
- radiation therapy to lymph nodes in the neck

Buccal mucosa

If cancer is in the buccal mucosa (the lining of the inside of the cheeks), treatment may include:

- surgery (wide local excision) for tumors smaller than 1 centimeter, with or without internal and/or external radiation therapy
- surgery (wide local excision with skin graft) or radiation therapy for larger tumors

Floor of the mouth

If cancer is in the floor (bottom) of the mouth, treatment may include:

- surgery (wide local excision) for tumors smaller than ½ centimeter
- surgery (wide local excision) or radiation therapy for larger tumors

Lower gingiva

If cancer is in the lower gingiva (gums), treatment may include:

- surgery (wide local excision, which may include removing part of the jawbone, and skin graft)
- radiation therapy with or without surgery

Retromolar trigone

If cancer is in the retromolar trigone (the small area behind the wisdom teeth), treatment may include:

- surgery (wide local excision, which may include removing part of the jawbone)
- radiation therapy with or without surgery

Upper gingiva or hard palate

If cancer is in the upper gingiva (gums) or the hard palate (the roof of the mouth), treatment is usually surgery (wide local excision) with or without radiation therapy.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Treatment of Stage II Lip and Oral Cavity Cancer

Learn about the treatments listed below in the Treatment Option Overview.

Treatment of stage II lip and oral cavity cancer depends on where cancer is found in the lip and oral cavity.

Lip

If cancer is in the lip, treatment may include:

- surgery (wide local excision)
- external radiation therapy and/or internal radiation therapy

Front of the tongue

If cancer is in the front of the tongue, treatment may include:

- radiation therapy and/or surgery (wide local excision)
- internal radiation therapy with surgery (neck dissection)

Buccal mucosa

If cancer is in the buccal mucosa (the lining of the inside of the cheeks), treatment may include:

- radiation therapy for tumors that are 3 centimeters or smaller
- surgery (wide local excision) and/or radiation therapy for larger tumors

Floor of the mouth

If cancer is in the floor (bottom) of the mouth, treatment may include:

- surgery (wide local excision)
- radiation therapy
- surgery (wide local excision) followed by external radiation therapy, with or without internal radiation therapy, for large tumors

Lower gingiva

If cancer is in the lower gingiva (gums), treatment may include:

- surgery (wide local excision, which may include removing part of the jawbone, and a skin graft)
- radiation therapy alone or after surgery

Retromolar trigone

If cancer is in the retromolar trigone (the small area behind the wisdom teeth), treatment may include:

- surgery (wide local excision, which includes removing part of the jawbone)
- radiation therapy with or without surgery

Upper gingiva or hard palate

If cancer is in the upper gingiva (gums) or the hard palate (the roof of the mouth), treatment may include:

- surgery (wide local excision) with or without radiation therapy
- radiation therapy alone

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Treatment of Stage III Lip and Oral Cavity Cancer

Learn about the treatments listed below in the Treatment Option Overview.

Treatment of stage III lip and oral cavity cancer depends on where cancer is found in the lip and oral cavity.

Lip

If cancer is in the lip, treatment may include surgery and external radiation therapy with or without internal radiation therapy.

Front of the tongue

If cancer is in the front of the tongue, treatment may include:

- external radiation therapy with or without internal radiation therapy
- surgery (wide local excision) followed by radiation therapy

Buccal mucosa

If cancer is in the buccal mucosa (the lining of the inside of the cheeks), treatment may include:

- surgery (wide local excision) with or without radiation therapy
- radiation therapy

Floor of the mouth

If cancer is in the floor (bottom) of the mouth, treatment may include:

- surgery (wide local excision, which may include removing part of the jawbone, with or without neck dissection)
- external radiation therapy with or without internal radiation therapy

Lower gingiva

If cancer is in the lower gingiva (gums), treatment may include surgery (wide local excision) with or without radiation therapy. Radiation may be given before or after surgery.

Retromolar trigone

If cancer is in the retromolar trigone (the small area behind the wisdom teeth), treatment may include surgery to remove the tumor, lymph nodes, and part of the jawbone, with or without radiation therapy.

Upper gingiva

If cancer is in the upper gingiva (gums), treatment may include:

- radiation therapy
- surgery (wide local excision) and radiation therapy

Hard palate

If cancer is in the hard palate (the roof of the mouth), treatment may include:

- radiation therapy
- surgery (wide local excision) with or without radiation therapy

Lymph nodes

For cancer that may have spread to lymph nodes, treatment may include radiation therapy and/or surgery (neck dissection).

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Treatment of Stage IV Nonmetastatic Lip and Oral Cavity Cancer

Learn about the treatments listed below in the Treatment Option Overview.

Treatment of stages IVA and IVB lip and oral cavity cancer depends on where cancer is found in the lip and oral cavity.

Lip

If cancer is in the lip, treatment may include surgery and external radiation therapy with or without internal radiation therapy.

Front of the tongue

If cancer is in the front of the tongue, treatment may include:

- surgery to remove the tongue and sometimes the larynx (voice box) with or without radiation therapy
- radiation therapy as palliative therapy to relieve symptoms and improve quality of life

Buccal mucosa

If cancer is in the buccal mucosa (the lining of the inside of the cheeks), treatment may include surgery (wide local excision) and/or radiation therapy.

Floor of the mouth

If cancer is in the floor (bottom) of the mouth, treatment may include surgery before or after radiation therapy.

Lower gingiva

If cancer is in the lower gingiva (gums), treatment may include surgery and/or radiation therapy.

Retromolar trigone

If cancer is in the retromolar trigone (the small area behind the wisdom teeth), treatment may include surgery to remove the tumor, lymph nodes, and part of the jawbone, followed by radiation therapy.

Upper gingiva or hard palate

If cancer is in the upper gingiva (gums) or hard palate (the roof of the mouth), treatment may include surgery with radiation therapy.

Lymph nodes

For cancer that may have spread to lymph nodes, treatment may include radiation therapy and/or surgery (neck dissection).

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Treatment of Stage IV Metastatic and Recurrent Lip and Oral Cavity Cancer

Learn about the treatments listed below in the Treatment Option Overview.

Treatment of metastatic (IVC) and recurrent lip and oral cavity cancer may include:

- surgery, if radiation therapy was used before
- surgery and/or radiation therapy, if surgery was used before
- immunotherapy (nivolumab (https://www.cancer.gov/about-cancer/treatment/drugs/nivolumab) or pembrolizumab (https://www.cancer.gov/about-cancer/treatment/drugs/pembrolizumab))

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## To Learn More About Lip and Oral Cavity Cancer

For more information from the National Cancer Institute about lip and oral cavity cancer, visit:

- Head and Neck Cancer Home Page (https://www.cancer.gov/types/head-and-neck/)
- Oral Cavity, Oropharyngeal, Hypopharyngeal, and Laryngeal Cancers Prevention
- Oral Cavity and Nasopharyngeal Cancers Screening
- Oral Complications of Cancer Therapies
- Head and Neck Cancers (https://www.cancer.gov/types/head-and-neck/head-neck-fact-sheet)

For general cancer information and other resources from the National Cancer Institute, visit:

- About Cancer (https://www.cancer.gov/about-cancer)
- Cancer Staging (https://www.cancer.gov/about-cancer/diagnosis-staging/staging)
- Chemotherapy and You: Support for People With Cancer (https://www.cancer.gov/publications/patient-education/chemo-and-you)
- Radiation Therapy and You: Support for People With Cancer (https://www.cancer.gov/publications/patient-education/radiation-therapy-and-you)
- Coping with Cancer (https://www.cancer.gov/about-cancer/coping)
- Questions to Ask Your Doctor about Cancer (https://www.cancer.gov/about-cancer/coping/questions)
- For Survivors, Caregivers, and Advocates (https://cancercontrol.cancer.gov/ocs/resources/survivors.html)

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about the treatment of adult lip and oral cavity cancer. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Adult Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/adult-treatment).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Adult Treatment Editorial Board. PDQ Lip and Oral Cavity Cancer Treatment. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/head-and-neck/patient/adult/lip-mouth-treatment-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389326]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).